# Grief, Bereavement, and Loss (PDQ®)

Patient Version

This PDQ cancer information summary has current information about how individuals cope with grief, bereavement, and mourning. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board.

## Overview

Grief and mourning are part of the normal process of dealing with a loss. Bereavement is the period of grief and mourning after a death of a loved one. Most people will adjust to the loss over time. Others will have longer periods of bereavement and may benefit from treatment.

This summary explains how grief, mourning, and bereavement are different and describes the different types of grief, treatments for grief, and important issues for grieving children.

## Grief, Mourning, and Bereavement

Key Points for This Section
- Grief is the emotional response to the loss of a loved one.
- Mourning is the way we show grief in public.
- Bereavement is the period of sadness after a death of a loved one.

### Grief is the emotional response to the loss of a loved one.

Common grief reactions include:

- Feeling emotionally numb.
- Being unable to believe the loss occurred.
- Having anxiety from the distress of being separated from the loved one.
- Mourning along with feeling depressed.
- A feeling of acceptance.

### Mourning is the way we show grief in public.

The way people mourn is affected by beliefs, religious practices, and culture. Grief and mourning are closely related.

### Bereavement is the period of sadness after a death of a loved one.

Grief and mourning occur during the period of bereavement. People who are grieving are described as bereaved.

## Types of Grief

Key Points for This Section
- There are three types of grief: anticipatory, normal or common, and complicated.
  - Anticipatory grief occurs before death.
  - Anticipatory grief does not affect everyone.
  - Normal or common grief begins soon after a loss and symptoms go away over time.
  - Normal grief is different from major depression.
  - Complicated grief lasts longer than normal grief.

### There are three types of grief: anticipatory, normal or common, and complicated.

#### Anticipatory grief occurs before death.

Anticipatory grief is grief that occurs leading up to a death. It may be felt by the person dying or person's family. When a patient experiences distress, pain, and medical complications, it can add to anticipatory grief. Anticipatory grief is different from grief that occurs after the death.

#### Anticipatory grief does not affect everyone.

Research has shown that about one in four patients with incurable cancer feels anticipatory grief. Anticipatory grief is less likely to occur when the patient and family accept death. Talking with someone who is trained in grief and bereavement may help patients and their family come to terms with impending death.

In a study of parents who have lost a child to cancer, parents who felt prepared for their child's end of life were better able to function in social roles and activities in the first 2 years after their loss.

#### Normal or common grief begins soon after a loss and symptoms go away over time.

Normal grief occurs in most people who have experienced a loss. During normal grief, the bereaved person accepts the loss and continues with daily activities even though it is hard to do. Common emotional reactions include:

- Emotional numbness, shock, disbelief, or denial. These often occur right after the death, especially if the death was not expected.
- Anxiety over being separated from the loved one. The bereaved may wish to bring the person back and become lost in thoughts of the deceased. Images of death may occur often in the person’s thoughts.
- Distress that leads to crying; sighing; having dreams, illusions, and hallucinations of the deceased; and looking for places or things that were shared with the deceased.
- Anger.
- Periods of sadness, loss of sleep, loss of appetite, fatigue, guilt, and loss of interest in life.

Grief bursts or pangs are short periods (20-30 minutes) of very intense distress. These bursts are caused by reminders of the deceased person, such as during holidays, the anniversary of the loved one’s death, or when giving away items that belonged to the person. At other times they seem to happen for no reason.

In normal grief, symptoms will occur less often and will feel less severe as time passes. Recovery time will vary with each person. For most bereaved people, symptoms lessen between 6 months and 2 years after the loss. Although many bereaved people have similar responses as they cope with their losses, there is no typical grief response.

#### Normal grief is different from major depression.

When a person grieves they can have symptoms that overlap with major depression, such as sleep problems, feelings of guilt, repeated thoughts, and lack of interest. Normal grief is different from major depression in the following ways:

- Painful feelings come and go instead of being constant.
- There are feelings of emptiness rather than sadness or not feeling pleasure.
- People have good self-esteem and do not feel worthless or badly about themselves.
- If there are thoughts of suicide, they are focused on the deceased person, such as a wish to join them in death, instead of thoughts about oneself.

A bereaved person can be diagnosed with major depression if they have symptoms that occur outside of the normal grief process.

#### Complicated grief lasts longer than normal grief.

Complicated grief is when symptoms don't improve and last for a long period of time, cause extreme distress, affect multiple areas of their lives, and decrease the ability to take part in daily activities.

## Factors that Affect Grief

Key Points for This Section
- There are factors that affect the response to grief.
  - The personality, age, and sex of the bereaved may affect whether they are more likely to experience depression with their grief.
  - Culture and religion play a part in grief and bereavement.
  - Coping skills and mental health history affect the response to an expected or unexpected loss.
  - Social support for the bereaved.

### There are factors that affect the response to grief.

A person’s grief is affected by their:

- Personality, age, and sex.
- Cultural and religious background.
- Coping skills and mental health history.
- Amount of support they have.
- Social and financial position.
- Relationship with the person who died.
- The deceased's cancer experience and the way the disease progressed.

#### The personality, age, and sex of the bereaved may affect whether they are more likely to experience depression with their grief.

Studies have found that people with certain personality traits are more likely to have long-lasting depression after a loss. These include people who are dependent on a loved one (such as a spouse), and people who deal with distress by thinking about it all the time.

In general, younger bereaved people have more problems after a loss than older bereaved people do. They have more severe health problems, grief symptoms, and other mental and physical symptoms. Younger bereaved people, however, may recover more quickly than older bereaved people do, because they tend to have more resources and social support.

Men have more problems than women do after a spouse’s death. Men tend to have worse depression and more health problems than women do after the loss. Some researchers think this may be because men tend to have less social support after a loss.

#### Culture and religion play a part in grief and bereavement.

Grief occurs in all cultures. However, some cultures have different beliefs about death that affect the attitudes and practices of the bereaved. They use what will best meet their needs to deal with death.

Some studies show that religion helps people cope better with grief, while other studies show it does not help or causes more distress. Regular church attendance and social support from a religious setting are linked to positive grief outcomes, such as coping and understanding the loss.

#### Coping skills and mental health history affect the response to an expected or unexpected loss.

It may seem that any sudden, unexpected loss might lead to more difficult grief. However, studies have found that bereaved people with high self-esteem and/or a feeling that they have control over life are likely to have a normal grief reaction even after an unexpected loss. Bereaved people with low self-esteem and/or a sense that life cannot be controlled are more likely to have complicated grief after an unexpected loss. This includes more depression and physical problems.

#### Social support for the bereaved.

Lack of social support increases the chance of having problems coping with a loss. Social support includes the person's family, friends, neighbors, and community members who can give psychological, physical, and financial help. After the death of a close family member, many people have related losses. The death of a spouse, for example, may cause a loss of income and changes in lifestyle and day-to-day living. These are all related to social support.

## Treatment of Grief

Key Points for This Section
- Normal grief may not need to be treated.
- Cognitive behavioral therapy may help people with complicated grief.
- Depression related to grief may be treated with drugs.

### Normal grief may not need to be treated.

Most bereaved people work through grief and recover within the first 6 months to 2 years. Researchers are studying whether bereaved people who have normal grief would be helped by treatment. They are also studying whether treatment might prevent complicated grief in people who are likely to have it.

For people who have serious grief reactions or symptoms of distress, treatment may be helpful.

### Cognitive behavioral therapy may help people with complicated grief.

Cognitive behavioral therapy (CBT) helps a person learn skills that change negative thoughts and behaviors about grief.

A clinical trial compared CBT to counseling for complicated grief. Results showed that patients treated with CBT had more improvement in symptoms and general mental distress than those in the counseling group.

### Depression related to grief may be treated with drugs.

There is no standard drug therapy for depression that occurs with grief. The decision to treat grief-related depression with drugs is up to the patient and the health care professional.

Clinical trials of antidepressants for depression related to grief have found that the drugs can help relieve depression. However, they give less relief and take longer to work than they do when used for depression that is not related to grief. Some clinical trials have found that psychotherapy while on antidepressants can improve depression and reduce the intensity of grief.

## Children and Grief

Key Points for This Section
- Children have a different grief experience than adults.
- Several factors can affect how a child will cope with grief.
- A child’s understanding of death and the events near death depend on their age and developmental stage.
- There are three common worries children coping with a loss have about death.
  - Did I make the death happen?
  - Is it going to happen to me?
  - Who is going to take care of me?
- Talking honestly about the death and including the child in rituals may help the child cope with the loss.
  - Explain the death and answer questions.
  - Use the correct language.
  - Include the child in planning and attending memorial services.
- There are books and other resources with information on helping a grieving child.

### Children have a different grief experience than adults.

Children do not react to loss in the same ways as adults. These are some of the ways children's grief is different:

- Children show grief once in a while and for a short time span. A child who grieves may be sad one minute and playful the next. Often families think the child doesn’t understand the loss or has gotten over it quickly. Usually, neither is true. Children’s minds protect them from what is too much for them to handle.
- The bereavement process may continue as the child gets older. Children will revisit the loss repeatedly, especially at important times, such as going to camp, graduating from school, getting married, or having children.
- Grieving children may not show their feelings as openly as adults. Grieving children may jump right into activities instead of withdrawing or showing grief.
- Children cannot think through their thoughts and feelings like adults. Children may have trouble putting their feelings about grief into words. Strong feelings of anger and fears of death or being left alone may show up in the behavior of grieving children. Children often play death games as a way of working out their feelings and worries. These games give children a safe way to express their feelings.
- While grieving adults may withdraw and not talk to other people about the loss, children often talk to the people around them (even strangers) to see how they react and to get clues for how they should respond to the loss.
- Children may ask confusing questions such as, "I know grandpa died, but when will he come home?" This is a way of testing reality and making sure the story of the death has not changed.

### Several factors can affect how a child will cope with grief.

Although grief is different for each child, several factors can affect the grief process of a child:

- The child's age and stage of development.
- The child's personality.
- The child's previous experiences with death.
- The child's relationship with the deceased.
- The child’s surroundings.
- The cause of death.
- The way the child acts and communicates within the family.
- How stable the family life is after the loss.
- How the child continues to be cared for.
- Whether the child is given the chance to share and express feelings and memories.
- How the parents cope with stress.
- Whether the child has ongoing relationships with other adults.

### A child’s understanding of death and the events near death depend on their age and developmental stage.

Infants

Infants do not recognize death, but feelings of loss and separation are part of their awareness of death. Children who have been separated from their mother may be sluggish and quiet, may not respond to a smile or a coo, may have physical symptoms (such as weight loss), and may sleep less.

Age 2-3 years

Children at this age often confuse death with sleep and may feel anxiety as early as age 3. They may stop talking and appear to feel overall distress.

Age 3-6 years

At this age children see death as a kind of sleep; the person is alive, but only in a limited way. The child cannot fully separate death from life. Children may think that the person is still living, even though he or she might have been buried. The child may ask questions about the deceased (for example, how does the deceased eat, go to the bathroom, breathe, or play?). Young children know that death is physical, but think it is not final.

A child may think death involves "magical thinking." For example, the child may think that his or her thoughts can cause another person to become sick or die.

Grieving children under 5 may have trouble eating, sleeping, and controlling their bladder and bowel.

Age 6-9 years

Children at this age are often very curious about death and may ask what happens to the body when it dies. Death is thought of as a person or spirit separate from the person who was alive, such as a skeleton, ghost, angel, or bogeyman. They may see death as final and scary but as something that happens mostly to old people (and not to themselves).

Grieving children can become afraid of school, have learning problems, show antisocial or aggressive behavior, or become overly worried about their own health and complain of imaginary symptoms. Children this age may either withdraw from others or become too attached and clingy.

Boys may become more aggressive and destructive (for example, acting out in school), instead of showing their sadness openly.

When one parent dies, children may feel abandoned by both the deceased parent and the living parent, whose grief may make him or her unable to emotionally support the child.

Age 9 and older

Children aged 9 and older know that death cannot be avoided and do not see it as a punishment. By the time a child is 12 years old, death is seen as final and something that happens to everyone.

Grief and Developmental Stages

Age | Understanding of Death | Expressions of Grief
0-2 years | Is not yet able to understand death. | Quietness, crankiness, decreased activity, poor sleep, and weight loss.
0-2 years | Separation from mother causes changes. | Quietness, crankiness, decreased activity, poor sleep, and weight loss.
2-6 years | Death is like sleeping. | Asks many questions (How does she go to the bathroom? How does he eat?).
2-6 years | Death is like sleeping. | Problems with eating, sleeping, and bladder and bowel control.
2-6 years | Death is like sleeping. | Fear of being left alone.
2-6 years | Death is like sleeping. | Tantrums.
2-6 years | Dead person continues to live and function in some ways. | "Magical thinking" (Did I think or do something that caused the death? Like when I said I hate you and I wish you would die?).
2-6 years | Death is not final. | "Magical thinking" (Did I think or do something that caused the death? Like when I said I hate you and I wish you would die?).
2-6 years | Dead person can come back to life. | "Magical thinking" (Did I think or do something that caused the death? Like when I said I hate you and I wish you would die?).
6-9 years | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | Curious about death.
6-9 years | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | Asks specific questions.
6-9 years | Death is thought of as a person or spirit (skeleton, ghost, or bogeyman). | May have fears about school.
6-9 years | Death is final and scary. | May have aggressive behavior (especially boys).
6-9 years | Death is final and scary. | Worries about imaginary illnesses.
6-9 years | Death happens to others, but it won’t happen to me. | May feel abandoned.
9 and older | Everyone will die. | Strong emotions, guilt, anger, shame.
9 and older | Everyone will die. | Increased anxiety over own death.
9 and older | Everyone will die. | Mood swings.
9 and older | Death is final. | Fear of rejection; not wanting to be different from peers.
9 and older | Even I will die. | Changes in eating habits.
9 and older | Even I will die. | Sleeping problems.
9 and older | Even I will die. | Regressive behavior (loss of interest in outside activities).
9 and older | Even I will die. | Impulsive behavior.
9 and older | Even I will die. | Feels guilty about being alive (especially related to death of a sibling or peer).

### There are three common worries children coping with a loss have about death.

#### Did I make the death happen?

Children often think that they have "magical powers." If a mother is irritated and says, "You’ll be the death of me" and later dies, her child may wonder if he or she caused the mother’s death. Also, when children argue, one may say (or think), "I wish you were dead." If that child dies, the surviving child may think that those thoughts caused the death.

#### Is it going to happen to me?

The death of another child may be very hard for a child. If the child thinks that the death may have been prevented (by either a parent or a doctor) the child may fear that he or she could also die.

#### Who is going to take care of me?

Since children depend on parents and other adults to take care of them, a grieving child may wonder who will care for him or her after the death of an important person.

### Talking honestly about the death and including the child in rituals may help the child cope with the loss.

#### Explain the death and answer questions.

Talking about death helps children learn to cope with loss. When talking about death with children, describe it simply. Each child should be told the truth with as much detail as he or she is able to understand. Answer questions in a way the child can understand.

Children often worry that they will also die, or that their surviving parent will go away. They need to be told that they will be safe and taken care of.

#### Use the correct language.

When talking with the child about death, include the correct words, such as "cancer," "died," and "death." Other phrases such as, “he passed away,” “he is sleeping,” or “we lost him,” can confuse children.

#### Include the child in planning and attending memorial services.

When a death occurs, children may feel better if they are included in planning and attending memorial services. These events help children remember the loved one. Children should be encouraged to take part when they feel comfortable doing so and not be forced. Before a child attends a funeral, wake, or memorial service, give the child a full explanation of what to expect. A familiar adult or family member may help with this if the surviving parent's grief makes him or her unable to.

### There are books and other resources with information on helping a grieving child.

The following books and videos may be helpful with grieving children:

1. Worden JW: Children and Grief: When a Parent Dies. New York, NY: The Guilford Press, 1996.
2. Doka KJ, ed.: Children Mourning, Mourning Children. Washington, DC: Hospice Foundation of America, 1995.
3. Wass H, Corr CA: Childhood and Death. Washington, DC: Hemisphere Publishing Corporation, 1984.
4. Corr CA, McNeil JN: Adolescence and Death. New York, NY: Springer Publishing Company, 1986.
5. Corr CA, Nabe CM, Corr DM: Death and Dying, Life and Living. 2nd ed., Pacific Grove: Brooks/Cole Publishing Company, 1997.
6. Grollman EA: Talking About Death: A Dialogue Between Parent and Child. 3rd ed., Boston, MA: Beacon Press, 1990.
7. Schaefer D, Lyons C: How Do We Tell the Children? Helping Children Understand and Cope When Someone Dies. New York, NY: Newmarket Press, 1988.
8. Wolfelt A: Helping Children Cope with Grief. Muncie: Accelerated Development, 1983.
9. Walker A: To Hell with Dying. San Diego, CA: Harcourt Brace Jovanovich, 1988.
10. Williams M: Velveteen Rabbit. Garden City: Doubleday, 1922.
11. Viorst J: The Tenth Good Thing About Barney. New York, NY: Atheneum, 1971.
12. Tiffault BW: A Quilt for Elizabeth. Omaha, NE: Centering Corporation, 1992.
13. Levine JR: Forever in My Heart: a Story to Help Children Participate in Life as a Parent Dies. Burnsville, NC: Mountain Rainbow Publications, 1992.
14. Knoderer K: Memory Book: a Special Way to Remember Someone You Love. Warminster, PA: Mar-Co Products, 1995.
15. de Paola T: Nana Upstairs and Nana Downstairs. New York, NY: GP Putnam’s Sons, 1973.

## To Learn More About Grief, Bereavement, and Loss

For more information from the National Cancer Institute about grief, see the following:

- Coping With Your Feelings During Advanced Cancer (https://www.cancer.gov/about-cancer/advanced-cancer/feelings)
- Taking Care of Yourself (https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/self-care)

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about how individuals cope with grief, bereavement, and mourning. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Grief, Bereavement, and Loss. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/advanced-cancer/caregivers/planning/bereavement-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389267]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).